# Adult Primary Liver Cancer Treatment

Patient Version

This PDQ cancer information summary has current information about the treatment of adult primary liver cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## What Is Liver Cancer?

Primary liver cancer is a disease in which malignant (cancer) cells form in the tissues of the liver. Cancer that forms in other parts of the body and spreads to the liver is not primary liver cancer. The liver is one of the largest organs in the body. It has two lobes and fills the upper right side of the abdomen inside the rib cage. The main functions of the liver include the following:

- to make bile to help digest fat that comes from food
- to store glycogen (sugar), which the body uses for energy
- to filter harmful substances from the blood so they can be passed from the body in stools and urine

Anatomy of the liver. The liver is in the upper abdomen near the stomach, intestines, gallbladder, and pancreas. The liver has a right lobe and a left lobe. Each lobe is divided into two sections (not shown).

Anatomy of the liver; drawing shows the right and left lobes of the liver. Also shown are the bile ducts, gallbladder, stomach, spleen, pancreas, small intestine, and colon.

### Types of liver cancer

Hepatocellular carcinoma and bile duct cancer (cholangiocarcinoma) (https://www.cancer.gov/types/liver/bile-duct-cancer/treatment) are the main types of adult primary liver cancer.

Most adult primary liver cancers are hepatocellular carcinomas. This type of liver cancer is the third leading cause of cancer-related deaths worldwide.

Primary liver cancer can occur in both adults and children. However, treatment for children is different than treatment for adults. For more information, see Childhood Liver Cancer (https://www.cancer.gov/types/liver/childhood-liver-cancer).

### Signs and symptoms of liver cancer

These and other signs and symptoms may be caused by adult primary liver cancer or by other conditions. Check with your doctor if you have any of the following:

- a hard lump on the right side just below the rib cage
- discomfort in the upper abdomen on the right side
- a swollen abdomen
- pain near the right shoulder blade or in the back
- jaundice (yellowing of the skin and whites of the eyes)
- easy bruising or bleeding
- unusual tiredness or weakness
- nausea and vomiting
- loss of appetite or feelings of fullness after eating a small meal
- weight loss for no known reason
- pale, chalky bowel movements and dark urine
- fever

## How is liver cancer diagnosed?

Tests that examine the liver and the blood are used to detect and diagnose liver cancer. Every person will not receive all the tests described below.

The following tests and procedures may be used:

- Physical exam and health history: A physical exam of the body will be done to check a person’s health, including checking for signs of disease, such as lumps or anything else that seems unusual. A history of the patient’s health habits and past illnesses and treatments will also be taken.
- Alpha-fetoprotein (AFP) tumor marker test: Tumor markers are released into the blood by organs, tissues, or tumor cells in the body. An increased level of AFP in the blood may be a sign of liver cancer. Other cancers and certain noncancerous conditions, including cirrhosis and hepatitis, may also increase AFP levels. Sometimes the AFP level is normal even when there is liver cancer.
- Liver function tests: These blood tests measure the amounts of certain substances released into the blood by the liver. A higher-than-normal amount of a substance can be a sign of liver cancer.
- CT scan (CAT scan): This procedure uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the abdomen, taken from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Images may be taken at three different times after the dye is injected, to get the best picture of abnormal areas in the liver. This is called triple-phase CT. A spiral or helical CT scan makes a series of very detailed pictures of areas inside the body using an x-ray machine that scans the body in a spiral path.
- Magnetic resonance imaging (MRI): This procedure uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the liver. To create detailed pictures of blood vessels in and near the liver, dye is injected into a vein. This procedure is called magnetic resonance angiography. Images may be taken at three different times after the dye is injected, to get the best picture of abnormal areas in the liver. This is called triple-phase MRI.
- Ultrasound exam: This procedure uses high-energy sound waves (ultrasound) that are bounced off the liver and make echoes. The echoes form a picture of the liver called a sonogram.
- Biopsy: During a biopsy, cells or tissues are removed so they can be viewed under a microscope by a pathologist to check for signs of cancer. Procedures used to collect the sample of cells or tissues include the following:
  - Fine-needle aspiration biopsy: A sample of fluid, tissue, or cells is removed using a thin needle.
  - Core needle biopsy: A sample of cells or tissue is removed using a slightly wider needle.
  - Laparoscopy: This surgical procedure is done to look at the organs inside the abdomen to check for signs of disease. Small incisions (cuts) are made in the wall of the abdomen and a laparoscope (a thin, lighted tube) is inserted into one of the incisions. Another instrument is inserted through the same or another incision to remove the tissue samples.
  A biopsy is not always needed to diagnose liver cancer. Sometimes the doctors can diagnose liver cancer based on the results of imaging tests such as CT scans and MRI.

After primary liver cancer has been diagnosed, tests are done to find out if cancer cells have spread within the liver or to other parts of the body. The process of determining the size and location of the cancer and whether it has spread is called staging.

Some of the tests and procedures used to diagnose liver cancer, such as CT scan and MRI, may be used in the staging process. A positron emission tomography (PET) scan may also be used:

- PET scan: This procedure is used to find malignant tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells do.

### What affects liver cancer prognosis?

Once liver cancer has been diagnosed, the prognosis (chance of recovery) and treatment options depend on the following:

- the stage of the cancer (the size of the tumor, whether it affects part or all of the liver, or has spread to other places in the body)
- how well the liver is working
- the patient's general health, including whether there is cirrhosis of the liver

Finding and treating liver cancer early may prevent death from liver cancer.

Learn more about trends and statistics for liver cancer (https://seer.cancer.gov/statfacts/html/livibd.html).

## Liver Cancer Stages

This page describes the stages of liver cancer for adults. The stage describes the extent of cancer in the body. Knowing the stage of liver cancer helps the doctor plan the best treatment.

To learn about liver cancer stages for children, see Stages of hepatoblastoma (https://www.cancer.gov/types/liver/childhood-liver-cancer/hepatoblastoma#_32).

To learn about the tests and procedures used to diagnose and stage primary liver cancer, see Liver Cancer Diagnosis (https://www.cancer.gov/types/liver/what-is-liver-cancer/diagnosis).

There are several staging systems for liver cancer. The Barcelona Clinic Liver Cancer (BCLC) Staging System is widely used to stage primary liver cancer. The system is used to predict the patient’s chance of recovery and to plan treatment, based on the following:

- whether the cancer has spread within the liver or to other parts of the body
- how well the liver is working
- the general health and wellness of the patient
- the symptoms caused by the cancer

The BCLC staging system has five stages:

- stage 0: very early
- stage A: early
- stage B: intermediate
- stage C: advanced
- stage D: end-stage

For liver cancer in adults, stages are also grouped according to how the cancer may be treated:

- Localized liver cancer has not spread outside the liver and can be removed by surgery. This includes BCLC stages 0, A, and B.
- Locally advanced liver cancer has not spread from the liver to distant parts of the body but cannot be safely removed by surgery. This includes BCLC stage C.
- Metastatic liver cancer is cancer that has spread from the liver to distant parts of the body. Metastatic liver cancer cannot be completely removed by surgery. This includes BCLC stage D. To learn more about metastatic cancer, see Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).
- Recurrent liver cancer is cancer that came back after treatment. The cancer may come back in the liver or in other parts of the body. To learn more about recurrent cancer, see Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer).

To learn about other ways cancer stages can be described, see Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

To learn about treatment options, see Liver Cancer Treatment (https://www.cancer.gov/types/liver/what-is-liver-cancer/treatment).

## Liver Cancer Treatment

There are different types of treatment for people with liver cancer. Some treatments are standard (the currently used treatment), and some are being tested in clinical trials.

### Types of treatment

#### Surveillance

Surveillance is used for lesions smaller than 1 centimeter found during screening. Follow-up every 3 months is common. Surveillance is closely watching a person's condition but not giving any treatment unless there are changes in test results that show the condition is getting worse. During active surveillance, certain exams and tests are done on a regular schedule.

#### Surgery

A partial hepatectomy (surgery to remove the part of the liver where cancer is found) may be done. A wedge of tissue, an entire lobe, or a larger part of the liver, along with some of the healthy tissue around it is removed. The remaining liver tissue takes over the functions of the liver and may regrow.

#### Liver transplant

In a liver transplant, the entire liver is removed and replaced with a healthy donated liver. A liver transplant may be done when the disease is in the liver only and a donated liver can be found. If the person has to wait for a donated liver, other treatment is given as needed.

#### Ablation therapy

Ablation therapy removes or destroys tissue. Different types of ablation therapy are used for liver cancer:

- Radiofrequency ablation: Special needles are inserted directly through the skin or through an incision in the abdomen to reach the tumor. High-energy radio waves heat the needles and tumor which kills cancer cells.
- Microwave therapy: The tumor is exposed to high temperatures created by microwaves. This can damage and kill cancer cells or make them more sensitive to the effects of radiation and certain anticancer drugs.
- Percutaneous ethanol injection: A small needle is used to inject ethanol (pure alcohol) directly into a tumor to kill cancer cells. Several treatments may be needed. Usually local anesthesia is used, but if the person has many tumors in the liver, general anesthesia may be used.
- Cryoablation: An instrument is used to freeze and destroy cancer cells. This type of treatment is also called cryotherapy and cryosurgery. The doctor may use ultrasound to guide the instrument. Learn more at Cryosurgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/cryosurgery).
- Electroporation therapy: Electrical pulses are sent through an electrode placed in a tumor to kill cancer cells. Electroporation therapy is being studied in clinical trials.

#### Embolization therapy

Embolization therapy is used for people who cannot have surgery to remove the tumor or ablation therapy and whose tumor has not spread outside the liver. Embolization therapy is the use of substances to block or decrease the flow of blood through the hepatic artery to the tumor. When the tumor does not get the oxygen and nutrients it needs, it will not continue to grow.

The liver receives blood from the hepatic portal vein and the hepatic artery. Blood that comes into the liver from the hepatic portal vein usually goes to the healthy liver tissue. Blood that comes from the hepatic artery usually goes to the tumor. When the hepatic artery is blocked during embolization therapy, the healthy liver tissue continues to receive blood from the hepatic portal vein.

There are two main types of embolization therapy:

- Transarterial embolization (TAE): A small incision (cut) is made in the inner thigh and a catheter (thin, flexible tube) is inserted and threaded up into the hepatic artery. Once the catheter is in place, a substance that blocks the hepatic artery and stops blood flow to the tumor is injected.
- Transarterial chemoembolization (TACE): This procedure is like TAE except an anticancer drug is also given. The procedure can be done by attaching the anticancer drug to small beads that are injected into the hepatic artery or by injecting the anticancer drug through the catheter into the hepatic artery and then injecting the substance to block the hepatic artery. Most of the anticancer drug is trapped near the tumor and only a small amount of the drug reaches other parts of the body. This type of treatment is also called chemoembolization.

#### Targeted therapy

Targeted therapy is a type of treatment that uses drugs or other substances to identify and attack specific cancer cells. Targeted therapies used to treat advanced liver cancer include:

- bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)
- cabozantinib (https://www.cancer.gov/about-cancer/treatment/drugs/cabozantinib-s-malate)
- lenvatinib (https://www.cancer.gov/about-cancer/treatment/drugs/lenvatinibmesylate)
- ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab)
- regorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/regorafenib)
- sorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/sorafenibtosylate)

Learn more about targeted therapy and its side effects at Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

#### Immunotherapy

Immunotherapy is a treatment that uses the person's immune system to fight cancer. Substances made by the body or made in a laboratory are used to boost, direct, or restore the body's natural defenses against cancer.

Immune checkpoint inhibitors are a type of immunotherapy. Immune checkpoint inhibitors that may be used to treat liver cancer include:

- atezolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/atezolizumab) with the targeted therapy drug bevacizumab or cabozantinib
- durvalumab (https://www.cancer.gov/about-cancer/treatment/drugs/durvalumab) with tremelimumab (https://www.cancer.gov/about-cancer/treatment/drugs/tremelimumab-actl)
- nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab) with ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab)
- pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)

Learn more about immunotherapy and its side effects at Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy) and Immunotherapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/side-effects).

#### Radiation therapy

External radiation therapy uses a machine outside the body to send high-energy x-rays or other types of radiation toward the area of the body with cancer. Radiation is given in a series of treatments to allow healthy cells to recover and to make radiation more effective. The number of treatments is based on details about the cancer, such as the size and location of the tumor. Certain ways of giving external radiation therapy can help keep radiation from damaging nearby healthy tissue:

- Conformal radiation therapy: Conformal radiation therapy uses a computer to make a 3-dimensional, or 3-D, picture of the tumor and shapes the radiation beams to fit the tumor. This allows a high dose of radiation to reach the tumor and causes less damage to nearby healthy tissue.
- Stereotactic body radiation therapy: Stereotactic body radiation therapy uses special equipment to place the person in the same position for each radiation treatment. Once a day for several days, a radiation machine aims a larger than usual dose of radiation directly at the tumor. By having the person in the same position for each treatment, there is less damage to nearby healthy tissue. This procedure is also called stereotactic external beam radiation therapy and stereotaxic radiation therapy.
- Proton beam radiation therapy: Proton beam radiation therapy is a type of high-energy, external radiation therapy that uses streams of protons (tiny particles with a positive charge) to kill tumor cells. This type of treatment can lower the amount of radiation damage to healthy tissue near a tumor.

Learn more about radiation therapy and its side effects at Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Clinical trials

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of localized liver cancer

Treatment of localized liver cancer may include:

- surveillance for lesions smaller than 1 centimeter
- partial hepatectomy (surgery to remove the part of the liver where cancer is found)
- liver transplant
- ablation of the tumor using:
  - radiofrequency ablation
  - microwave therapy
  - percutaneous ethanol injection
  - cryoablation
- radiation therapy

### Treatment of locally advanced or metastatic liver cancer

Treatment of locally advanced or metastatic liver cancer may include:

- transarterial embolization (TAE) or transarterial chemoembolization (TACE) in people with locally advanced liver cancer
- bevacizumab, cabozantinib, lenvatinib, ramucirumab, regorafenib, or sorafenib
- atezolizumab with bevacizumab or cabozantinib, durvalumab with tremelimumab, nivolumab with ipilimumab, or pembrolizumab
- radiation therapy

### Treatment of recurrent liver cancer

Treatment options for recurrent primary liver cancer may include:

- total hepatectomy (surgery to remove all of the liver) and liver transplant
- partial hepatectomy (surgery to remove the part of the liver where cancer is found)
- ablation therapy
- radiation therapy
- transarterial chemoembolization (TACE) and sorafenib as palliative therapy to relieve symptoms and improve quality of life